# Informal Caregivers in Cancer: Roles, Burden, and Support (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about challenges and helpful interventions for caregivers of cancer patients. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Informal caregiving is broadly defined as services provided by an unpaid person, such as helping with personal needs and household chores, managing a person's finances, arranging for outside services, or visiting regularly.[1,2] An informal caregiver is usually a relative or friend and may or may not live in the same household as the person with cancer.

Informal caregiving provides significant practical and economic benefits. This summary describes the experiences of informal caregivers of people with cancer, explains the risk factors for caregiver burden (which is often associated with negative psychological consequences), and evaluates evidence-based interventions designed to reduce the burden of informal caregiving. The goal of the summary is to provide the oncology clinician with both a deeper appreciation of the importance of informal caregivers, and the information necessary to recognize burdened caregivers and effectively intervene.

### Who Are Informal Caregivers and What Roles Do They Play?

In 2016, the National Alliance for Caregiving reported an analysis of the survey responses of 111 caregivers who self-identified as providing care to a person with cancer.[3] The respondents were part of a much larger study that identified a representative sample of adult caregivers who provided unpaid care to an adult relative or friend in the 12 months preceding the time of the survey.

The following findings provide a snapshot of informal caregivers of people with cancer and the challenges they face:

- 58% were women.
- 88% cared for a relative.
- 39% lived with the person being cared for.
- 50% reported high emotional stress related to caregiving.
- 25% reported high financial strain.
- 50% were employed while caregiving, working an average of 35 hours per week.
- 73% were involved in discussions about care during hospitalization; however, only about half of them (54%) were asked what help was needed after discharge.
- 72% assisted with medical tasks.
- 43% reported needing help to manage emotional and physical stress.
- 40% wanted help making end-of-life decisions.
- 33% wanted help keeping their friend or relative safe at home.
- Caregiving for patients with cancer was noted to be episodic and lasted for approximately 2 years on average.

Caregiving is also relational.[4,5] In addition, there are important implications for the interconnectedness between patient and caregiver that the oncology clinician should be aware of, including the following:

- Patients and caregivers influence each other’s mental and physical health (partner effects) in addition to their own outcomes (actor effects).[6]
- The psychological well-being of caregivers seems to influence patients’ evaluations of the quality of their care. One survey of 689 patients and their caregivers demonstrated that higher levels of depression in caregivers were associated with patients’ ratings of lower quality of care.[7]
- There are important distinctions between the experiences of patients and informal caregivers. A semistructured interview study of 23 patients with advanced colorectal cancer and 23 caregivers demonstrated the prevalence and nature of these differences.[8] Participants agreed on four challenges:
  - Emotionally processing the initial diagnosis or recurrence.
  - Managing the practical and emotional aspects of patient care.
  - Facing an uncertain future.
  - Encountering symptom-related suffering.
  In no instance, however, did patient and caregiver identify the same key challenge. Clinicians are advised to assess caregiver needs independent of patient needs.
- The caregiver may not be an accurate informant of the patient’s experience. One study demonstrated that caregivers correctly reported 67% of patients’ physical difficulties, 69% of patients’ psychological difficulties, and 40% of patients’ social difficulties.[9] There were no predictive demographic factors. In further support of the need for caution, an analysis of office visits recorded on audiotape revealed that caregivers often spoke on behalf of patients without validation by the patients.[10] In addition to this pseudo-surrogacy, caregivers often conflated their concerns with those of the patients.

### The Psychological Consequences of Caregiving

The psychological consequences of caregiving vary widely. Some caregivers report positive outcomes such as post-traumatic growth and benefit finding. But a minority of caregivers experience anxiety, depression, or post-traumatic stress disorder (PTSD).

Benefit finding: Results of several qualitative studies (interviews or narrative questionnaires) of caregivers of either adult cancer survivors [11,12] or childhood cancer survivors [13,14] revealed common themes on the positive aspects of caregiving:

- Closer relationships with others, including partners and children.
- Greater appreciation of life.
- Clarification of life priorities.
- Increased faith.
- More empathy for others.
- Better health habits.

These common themes are more quantitatively measured by using the Benefit Finding Scale. Six domains of caregivers’ personal growth have been identified [15] and are consistent for both caregivers of survivors and those in bereavement:[16]

- Acceptance.
- Empathy.
- Appreciation.
- Family.
- Positive self-view.
- Reprioritization.

Anxiety and depression: Several large survey studies provide more accurate estimates of the prevalence and potential covariates or risk factors for anxiety and depression:

- In a systematic review and meta-analysis of 35 studies representing 11,396 caregivers of people with cancer, the pooled prevalence of depressive symptoms was 42.08% (95% confidence interval, 34.71%–49.45%). Studies were included in the meta-analysis if they used validated instruments to assess depression. However, the authors did not differentiate between studies that used cutoff scores associated with mild depressive symptoms and clinically significant depression.[17][Level of evidence: II]
- A telephone survey of 196 caregivers of patients with renal cell carcinoma studied the associations between psychological adjustment and caregivers’ experiences and unmet needs. Investigators demonstrated that 64% of caregivers had at least one significant unmet need, 53% had three or more unmet needs, and 29% had ten or more unmet needs.[18] Investigators found elevated anxiety in 29% of respondents and depression in 11%. Unmet information needs and worse experiences of care during surgery were risk factors for caregiver depression. Unmet information needs were the only risk factor for anxiety.
- A cross-sectional analysis assessed baseline data on caregivers of patients with advanced-stage lung or colorectal cancers enrolled in a randomized trial of early palliative care.[19] A significant proportion of caregivers reported elevated levels of anxiety (42.2%) or depression (21.5%). Risk factors for caregiver depression were patients’ expectation of cure and patients’ use of emotional support coping. Patients’ use of acceptance coping was associated with less caregiver anxiety. A study of caregivers of patients with pancreatic cancer reported similar results: 39% of caregivers had elevated levels of anxiety, and 14% had elevated levels of depression, compared with community norms.[20]

PTSD: One of the negative consequences of caregiving that persists is PTSD. A preliminary study of caregivers of patients with head and neck cancer 6 months after diagnosis demonstrated that approximately 20% met the criteria for PTSD.[21] Risk factors for PTSD included the following:

- Caregiver perception of low treatment benefit.
- Caregiver perception of many patient symptoms.
- Caregiver use of avoidant coping strategies.

The same investigators also showed in a similar population that differences in illness perceptions were dynamic over 6 months, but greater differences were correlated with reduced health-related quality of life (QOL) in patients.[22]

Decline in caregiver QOL: Several investigators have published measures of caregiver QOL while patients were undergoing active treatment. One study demonstrated that caregivers of patients undergoing hematopoietic stem cell transplant experience a decline in their QOL, as measured by the physical and mental component of the Medical Outcomes Study 36-Item Short Form Health Survey (SF-36).[5]

Patients receiving palliative therapy also rely heavily on informal caregivers. In a study of 201 informal caregivers of patients undergoing palliative radiation therapy for advanced cancer, additional employment of the caregiver, cohabitation, poor patient performance status, and interest in accessing more support services were significantly correlated with higher caregiver burden (poorer QOL).[23]

In summary, a caregiver provides essential support and resources to the person with cancer. However, the role of informal caregiver creates demands that may exceed the caregiver’s resources and, ultimately, cause negative psychological consequences. The rest of this summary focuses on the significant minority of caregivers who experience unmet needs and increased physical and psychological distress. After a brief review of the concept of caregiver burden, information about the demands on caregivers, resources valued by caregivers, potential moderators of caregiver burden, and coping strategies will be presented.

### References

Caregiving in the U.S. 2020. Washington, DC: National Alliance for Caregiving, 2020. Available online (https://www.caregiving.org/wp-content/uploads/2021/01/full-report-caregiving-in-the-united-states-01-21.pdf). Last accessed May 1, 2025.
Kim Y, Kashy DA, Kaw CK, et al.: Sampling in population-based cancer caregivers research. Qual Life Res 18 (8): 981-9, 2009.19655274
Cancer Caregiving in the U.S.: An Intense, Episodic, and Challenging Care Experience. Bethesda, Md: National Alliance for Caregiving, 2016. Available online (https://www.caregiving.org/wp-content/uploads/2020/05/CancerCaregivingReport_FINAL_June-17-2016.pdf). Last accessed May 1, 2025.
Litzelman K, Green PA, Yabroff KR: Cancer and quality of life in spousal dyads: spillover in couples with and without cancer-related health problems. Support Care Cancer 24 (2): 763-771, 2016.26143040
El-Jawahri AR, Traeger LN, Kuzmuk K, et al.: Quality of life and mood of patients and family caregivers during hospitalization for hematopoietic stem cell transplantation. Cancer 121 (6): 951-9, 2015.25469752
Kershaw T, Ellis KR, Yoon H, et al.: The Interdependence of Advanced Cancer Patients' and Their Family Caregivers' Mental Health, Physical Health, and Self-Efficacy over Time. Ann Behav Med 49 (6): 901-11, 2015.26489843
Litzelman K, Kent EE, Mollica M, et al.: How Does Caregiver Well-Being Relate to Perceived Quality of Care in Patients With Cancer? Exploring Associations and Pathways. J Clin Oncol 34 (29): 3554-3561, 2016.27573657
Mosher CE, Adams RN, Helft PR, et al.: Family caregiving challenges in advanced colorectal cancer: patient and caregiver perspectives. Support Care Cancer 24 (5): 2017-2024, 2016.26530227
Libert Y, Merckaert I, Slachmuylder JL, et al.: The ability of informal primary caregivers to accurately report cancer patients' difficulties. Psychooncology 22 (12): 2840-7, 2013.24038554
Mazer BL, Cameron RA, DeLuca JM, et al.: "Speaking-for" and "speaking-as": pseudo-surrogacy in physician-patient-companion medical encounters about advanced cancer. Patient Educ Couns 96 (1): 36-42, 2014.24862913
Mosher CE, Adams RN, Helft PR, et al.: Positive changes among patients with advanced colorectal cancer and their family caregivers: a qualitative analysis. Psychol Health 32 (1): 94-109, 2017.27775432
Von Ah D, Spath M, Nielsen A, et al.: The Caregiver's Role Across the Bone Marrow Transplantation Trajectory. Cancer Nurs 39 (1): E12-9, 2016 Jan-Feb.25785581
Willard VW, Hostetter SA, Hutchinson KC, et al.: Benefit Finding in Maternal Caregivers of Pediatric Cancer Survivors: A Mixed Methods Approach. J Pediatr Oncol Nurs 33 (5): 353-60, 2016.26811326
Hensler MA, Katz ER, Wiener L, et al.: Benefit finding in fathers of childhood cancer survivors: a retrospective pilot study. J Pediatr Oncol Nurs 30 (3): 161-8, 2013 May-Jun.23674549
Kim Y, Schulz R, Carver CS: Benefit-finding in the cancer caregiving experience. Psychosom Med 69 (3): 283-91, 2007.17420443
Kim Y, Carver CS, Schulz R, et al.: Finding benefit in bereavement among family cancer caregivers. J Palliat Med 16 (9): 1040-7, 2013.23905875
Bedaso A, Dejenu G, Duko B: Depression among caregivers of cancer patients: Updated systematic review and meta-analysis. Psychooncology 31 (11): 1809-1820, 2022.36209385
Oberoi DV, White V, Jefford M, et al.: Caregivers' information needs and their 'experiences of care' during treatment are associated with elevated anxiety and depression: a cross-sectional study of the caregivers of renal cancer survivors. Support Care Cancer 24 (10): 4177-86, 2016.27146491
Nipp RD, El-Jawahri A, Fishbein JN, et al.: Factors associated with depression and anxiety symptoms in family caregivers of patients with incurable cancer. Ann Oncol 27 (8): 1607-12, 2016.27177859
Janda M, Neale RE, Klein K, et al.: Anxiety, depression and quality of life in people with pancreatic cancer and their carers. Pancreatology 17 (2): 321-327, 2017 Mar - Apr.28153446
Richardson AE, Morton RP, Broadbent EA: Illness perceptions and coping predict post-traumatic stress in caregivers of patients with head and neck cancer. Support Care Cancer 24 (10): 4443-50, 2016.27241170
Richardson AE, Morton RP, Broadbent EA: Changes over time in head and neck cancer patients' and caregivers' illness perceptions and relationships with quality of life. Psychol Health 31 (10): 1203-19, 2016.27315836
Duimering A, Turner J, Chu K, et al.: Informal caregiver quality of life in a palliative oncology population. Support Care Cancer 28 (4): 1695-1702, 2020.31292753

## Caregiver Burden

The term caregiver burden describes a caregiver’s perceptions of the demands of caregiving and the resources available for addressing those demands. The Transactional Model of Stress and Coping is a useful framework for describing the relationships among caregiver demands, resources, burden, and the psychological consequences of being burdened.[1] From this perspective, a burden is perceived when the demands on the caregiver exceed the resources available. See the figure below for an illustration of how this framework may be applied to caregiver burden.

The process begins with the primary appraisal, which is a judgment about the relevance of the health threat and any demands on the caregiver. A demand that is judged to be relevant receives a secondary appraisal to evaluate the likelihood that available resources have the potential to reduce or overcome the demand. Burden is perceived to be high when the difficulty of the demand outweighs the available resources. Coping strategies may also determine whether the psychological consequences of the perceived burden are negative or positive.

The Transactional Model of Stress and Coping may explain why some caregivers experience burden and negative psychological consequences. Clinicians may intervene to reduce demands, increase resources, or foster adoptive coping. The text for antecedents, demands, and resources is from examples in the text of this summary.

Chart showing the Transactional Model of Stress and Coping, including the primary appraisal of health threats (illness that endangers personal goals and values) and antecedents (age, gender, health status, and employment); secondary appraisal of caregiver demands (daily living tasks, information, transportation, and decision making) and resources (social support, health team, interventions, and palliative care consults); coping (when resources are greater than demands and when demands are greater than resources) and coping strategies (problem focused, emotion focused, and meaning focused); and caregiver outcomes (acceptable burden and negative and positive psychological consequences of being burdened).

The Transactional Model of Stress and Coping shown above has not been validated and serves to organize the rest of the summary.

### Primary Appraisal: Demands on Informal Caregivers

Qualitative analysis of interviews: A mixed-methods study of 48 informal caregivers of patients undergoing chemotherapy demonstrated several notable findings.[2] First, 68% of the caregivers had one or no unmet needs. A minority (23%) had five to ten unmet needs. Second, the most common needs were for information about the risks and potential benefits of chemotherapy (79%) and managing side effects at home (78%). Other information-related needs included information about self-care, complementary and alternative therapies, and local community-based resources.

Another group of investigators interviewed six patients with head and neck cancer and their spouses within 6 months of completing treatment. Thematic analysis identified several unmet needs, including the following:[3]

- Better preparation for side effects.
- Clearer timeline of recovery.
- Strategies to deal with the emotions experienced by patients and spouses during treatment.

The complexity of a caregiver’s life was further highlighted in a systematic review of qualitative studies of informal caregivers of patients with cancer and symptoms or signs of cachexia.[4] Several themes were identified:

- Impact on everyday life.
- Attempts of caregiver to take charge.
- Need for health care provider input.
- Conflict with patient.
- Negative emotions.

Surveys: To provide a more accurate assessment of caregiver needs, investigators developed and demonstrated the psychometric validity of the Supportive Care Needs Survey—Partners and Caregivers (SCNS–P&C).[5] More than 500 caregivers of patients enrolled in a cancer survivor study returned surveys for analysis. The mean age of caregivers was 60.6 years (range, 16–85 years).

The diagnoses of survivors included the following:

- Prostate cancer (32%).
- Blood cancer (16.3%).
- Breast cancer (13.2%).
- Melanoma (11.5%).
- Colorectal cancer (11.3%).
- Head and neck cancer (8.6%).
- Lung cancer (7.1%).

Analysis revealed four domains of needs:

- Health care service.
- Psychological and emotional.
- Work and social.
- Informational.

Investigators used the SCNS–P&C to conduct a telephone survey of 196 caregivers of patients with renal cell carcinoma. They found that 64% of caregivers had at least one significant unmet need, 53% had three or more unmet needs, and 29% had ten or more unmet needs.[6] For each domain of needs, the proportion of respondents reporting a moderate or high unmet need was:

- Health care service, 30%.
- Psychological and emotional, 30%.
- Work and social, 23%.
- Informational, 18%.

In another study, 188 patient-caregiver dyads completed the SCNS–P&C.[7] The caregivers were predominantly female Their average age was 57.8 years. Caregivers reported higher levels of distress and anxiety than patients. A minority (14%) reported no unmet needs, and a plurality (44%) reported ten or more unmet needs. The principal unmet caregiver needs were:

- Support in managing fears about the patient’s condition.
- Receiving disease-related information.
- Receiving emotional support for themselves.

There were no strong predictors of caregiver needs. However, unmet patient needs and caregiver anxiety were modestly associated with unmet needs in caregivers.

Similarly, the SCNS–P&C was administered to 166 lung cancer patient–caregiver dyads in Taiwan.[8] The top unmet needs were information needs.

Caregiver tasks: A cross-sectional study demonstrated that assisting patients in activities of daily living (ADLs) increased caregiver burden.[9] This study enrolled 100 caregivers of older adults (age >65 years) with cancer. The caregivers were mostly women, married to and living with the patients. Employment status and participation in ADLs were risk factors for increased burden on multivariate analysis. Similarly, a survey of 590 caregivers showed that primary caregivers assumed a significant workload.[10] As a consequence, they experienced challenges in maintaining employment and social relations, and had financial difficulties. On the other hand, primary caregivers experienced the most personal growth through their experiences. A subsequent systematic review supported the results of the two studies.[11] A more nuanced view is that the perceived burden and psychological consequences may relate to the sense of mastery for any given caregiver task.[12]

### Secondary Appraisal: Resources for Informal Caregivers

This list captures the resources that caregivers identified in multiple studies as important:

- Recognition by health care providers of the informal caregivers’ roles, responsibilities, and challenges.
- Information about treatment plans, goals, anticipated complications or side effects, and likely outcomes.
- Guidance for how to respond to changes in patients’ physical and emotional health over the disease trajectory.
- Support in coping with the stress of caregiving (for which they are most often unprepared and untrained).
- Detailed education about medical and nursing tasks they are expected to perform, such as giving injections, providing wound care, and managing side effects.

### Potential Moderators of Caregiver Burden

Factors associated with increased caregiver burden include the following:

- Female gender.
- Age (younger or older with impaired health status).
- Race and ethnicity.
- Lower socioeconomic status.
- Employment status.
- Role strain.
- Site of care.
- Patient characteristics (e.g., level of anxiety, depression, functional status, and quality of life [QOL]).[13][Level of evidence: II]

#### Female gender

Female gender is an established risk factor for increased burden.[14,15][Level of evidence: II] A survey of 308 self-identified caregivers of patients with advanced cancer sought to characterize potential determinants of the increased burden for female caregivers.[16] Results demonstrated that hope and perceived fulfillment of support needs were the most significant protective factors against burden for any gender. Women who were employed or who used emotion-focused coping were more likely to perceive burden. These results suggest that interventions to address role strain and alternative coping strategies may be useful.

#### Age

Family caregivers often feel unprepared, have inadequate knowledge, and receive little guidance from the oncology team for caring for a cancer patient.[17] Older caregivers are especially vulnerable because they may present with comorbidities, be living on fixed incomes, and have reduced social support networks. In addition, older caregivers of cancer patients may neglect their own health needs, have less time to exercise, forget to take their own prescription medications, and become fatigued from interrupted sleep. It is common for older caregivers to have poor physical health, depression, and even increased mortality.[18,19]

Younger caregivers generally juggle work, family responsibilities, and sacrifices involving their social lives. Middle-aged caregivers typically worry about missed workdays, interruptions at work, taking leaves of absence, and reduced productivity.[20,21]

#### Race and ethnicity

Differences among racial and ethnic groups in caregiver time commitment, levels of support and resources, and attitudes have been noted. In a meta-analysis of 116 empirical studies, Asian American caregivers provided more caregiving hours than White, African American, and Hispanic caregivers; used lower levels of formal support services; and had fewer financial resources, lower levels of education, and higher levels of depression than other groups.[22] These findings are important for the oncology team because caregivers with no outside help are more depressed than are those who receive help.

A study involving unmet needs and service barriers among Asian American caregivers found that caregivers refused outside help because they “felt too proud to accept it” or “didn’t want outsiders coming in.” Other barriers included “bureaucracy too complex” or “can’t find qualified providers.”[23] A study of hospice use by Asian American patients found that family reluctance to discuss a patient's health status among themselves resulted in lower rates of hospice enrollment. This reluctance was rooted in the belief that talking about death or dying is bad luck, which could complicate discussions about prognosis and informed consent.[24] Keeping a cancer diagnosis secret from a patient and avoiding discussions about disease progression can add to a caregiver’s sense of burden and responsibility.

Similarly, Hispanic and African American patients and caregivers underutilize community health resources, including counseling and support groups, home care, residential care, and hospice services. Strong family ties may prevent these caregivers from seeking help outside of the family unit.[25] A study that compared African American, White, and Hispanic caregivers found that 75% of Hispanic patients and 60% of African American patients lived with the family of the primary caregiver. The racial and ethnic minority families relied more on informal caregiving from friends and relatives and had larger social support networks than the White families. However, this increased sense of obligation to care for older family members was associated with more caregiving hours, greater resignation about caregiving, higher levels of caregiver strain, and a larger reduction in household income compared with White caregivers.[25,26] For more information, see the Disparities in Hospice Utilization section in Hospice.

Another study analyzed reports of employment loss due to caregiving responsibilities. Results showed that African American and Hispanic caregivers were more likely than White caregivers to reduce their work hours to care for patients. In addition, African American and Hispanic caregivers were reluctant to use formal nursing home services for their loved ones. The decision to reduce work hours rather than place a relative in a nursing home was associated with increased psychological, social, and financial burden.[27]

#### Socioeconomic status

Substantial out-of-pocket costs related to caregiving can create financial strain for the families of patients with cancer. Low personal and household incomes and limited financial resources may also place families at risk of treatment noncompliance or making treatment-related decisions based on income.[28]

Investigators assessed caregiver burden in 414 caregivers of older patients with advanced cancer in a secondary analysis of longitudinal data (at baseline, 4–6 weeks, and 3 months) collected during the Improving Communication in Older Cancer Patients and their Caregivers trial.[29][Level of evidence: II] The authors used the Caregiver Reaction Assessment, which includes five subscales measuring domains of caregiving burden: self-esteem, disrupted schedule, financial problems, lack of family support, and health problems. Also assessed was caregivers' rurality, defining rural residence as living in 2010 Rural-Urban Commuting Area Codes other than 1.0, 1.1, 2.0, 2.1, 3.0, 4.1, 5.1, 7.1, 8.1, or 10.1. In the analysis, rural residence was significantly associated with more disrupted schedules, financial problems, and lack of social support among caregivers with a high school education or less.

#### Employment status

Informal caregiving is known to impose economic burdens on families. One study analyzed data from 458 cancer survivors who responded to the U.S. Medical Expenditure Panel Survey (MEPS) Experiences with Cancer Survivorship Survey (ECSS) and from 4,706 cancer survivors who responded to the LIVESTRONG 2012 Survey for People Affected by Cancer (SPAC). Results demonstrated that 25% of those responding to the MEPS ECSS and 29% of those responding to the SPAC reported that their caregivers made extended employment changes, including taking paid or unpaid time off and making changes in hours, duties, or employment status.[30] The work productivity of 70 caregivers of patients with advanced cancer showed a 23% decline because of missed work.[31] More hours of caregiving were associated with greater loss in productivity, which was associated with higher rates of caregiver depression and anxiety. In a study of 89 caregivers of advanced-cancer patients, 69% of caregivers reported some form of adverse impact on work. This portion increased to 77% during the end-of-life period.[32]

Some research has shown an incremental increase in the economic burden of caregiving, assessed from disease and demographic characteristics. A study of 78 caregivers of women with advanced breast cancer showed that loss of productivity (absenteeism and reduced productivity at work) was greater for caregivers of women with progressive disease than for caregivers of those who were free of disease.[33] A survey of 1,629 caregivers of people with lung and colorectal cancers demonstrated that economic burden was highest for caregivers of individuals with lung cancer or stage IV disease.[34] In a study of 54 caregivers, African American and Hispanic caregivers reported greater distress related to employment and finances than White caregivers.[35] A study of partner caregivers of men with prostate cancer showed that caregivers with lower incomes (<$40,000/year) spent more time on informal caregiving than those with higher incomes.[36]

The Family and Medical Leave Act of 1993 was designed to give employees the option of taking time off from work for their own serious medical condition or that of a relative without losing their jobs or benefits.[37] Family members are entitled to a maximum of 12 weeks’ leave under the law.

#### Role strain

Role strain is experienced when the perceived rights, duties, and behaviors of one socially defined role (e.g., employee) conflict with the rights, duties, and behaviors of a different role (e.g., student). The multiple roles performed by caregivers of cancer patients can compete for caregivers’ physical and emotional resources. A study of 457 middle-aged caregivers showed that the more social roles a caregiver performed, the more likely the caregiver was to experience stress and negative affect.[38] In a population-based study of 1,234 adult-child and spousal caregivers of patients with lung or colorectal cancer, caregiver employment was associated with higher social/emotional caregiver burden.[39][Level of evidence: II] It is important to recognize, however, that employed caregivers may benefit from the respite provided by work and from the support of employers and coworkers, which enable them to replenish their psychological resources.[38] Thus, multiple roles do not always engender strain.

#### Site of care

Cancer care is provided in multiple locations that vary in their ability to provide support services for caregivers. Thus, site of care may be considered a risk factor for caregiver burden. This claim is further supported by the results of a qualitative interview study of 12 patients and 12 caregivers about the challenges faced in transitioning from hospital to home.[40] The investigators identified four salient themes:

- Ongoing concerns related to disease and its treatment.
- Needing timely help.
- Resuming control and normality.
- Appreciating the care transition.

An independent study of dyads demonstrated that the transition to home is stressful because of the need to deal with symptoms, and uncertainty about prognosis and disease progression.[41] Increased caregiver burden caused by transitions in sites of care should be recognized and ameliorated, when possible, with home nursing visits.

Unplanned changes in sites of care, such as hospital readmission, also place increased demands on caregivers. A total of 129 dyads of older adults with cancer and their family caregivers were studied to determine factors for unplanned hospital admissions.[42] Investigators found that severity of symptoms, rather than caregiver knowledge—a target of many interventions—predicted unplanned hospital admissions in older adults with cancer during the active treatment. These results suggest that symptom management interventions may reduce stressful events more than increasing caregiver knowledge about symptoms.

#### Patient characteristics

Patient characteristics may also influence caregiver burden. In a cross-sectional study of 441 older patient-caregiver dyads with advanced cancer, patients with higher levels of anxiety and depression, worse functional status, and poorer QOL were associated with increased reports of caregiver burden, regardless of time spent caregiving.[13][Level of evidence: II]

Similarly, in a cross-sectional study of 172 dyads of patients with advanced cancer and their caregivers, caregivers of patients admitted to an acute palliative care unit reported worse stress burden and mental health than caregivers of patients receiving outpatient supportive care.[43][Level of evidence: II]

### References

Lazarus RS, Folkman S: Stress, Appraisal, and Coping. Springer Publishing Co, 1984.
Ream E, Pedersen VH, Oakley C, et al.: Informal carers' experiences and needs when supporting patients through chemotherapy: a mixed method study. Eur J Cancer Care (Engl) 22 (6): 797-806, 2013.23834290
Badr H, Herbert K, Reckson B, et al.: Unmet needs and relationship challenges of head and neck cancer patients and their spouses. J Psychosoc Oncol 34 (4): 336-46, 2016 Jul-Aug.27269579
Wheelwright S, Darlington AS, Hopkinson JB, et al.: A systematic review and thematic synthesis of quality of life in the informal carers of cancer patients with cachexia. Palliat Med 30 (2): 149-60, 2016.26024885
Girgis A, Lambert S, Lecathelinais C: The supportive care needs survey for partners and caregivers of cancer survivors: development and psychometric evaluation. Psychooncology 20 (4): 387-93, 2011.20878835
Oberoi DV, White V, Jefford M, et al.: Caregivers' information needs and their 'experiences of care' during treatment are associated with elevated anxiety and depression: a cross-sectional study of the caregivers of renal cancer survivors. Support Care Cancer 24 (10): 4177-86, 2016.27146491
Sklenarova H, Krümpelmann A, Haun MW, et al.: When do we need to care about the caregiver? Supportive care needs, anxiety, and depression among informal caregivers of patients with cancer and cancer survivors. Cancer 121 (9): 1513-9, 2015.25677095
Chen SC, Chiou SC, Yu CJ, et al.: The unmet supportive care needs-what advanced lung cancer patients' caregivers need and related factors. Support Care Cancer 24 (7): 2999-3009, 2016.26872793
Hsu T, Loscalzo M, Ramani R, et al.: Factors associated with high burden in caregivers of older adults with cancer. Cancer 120 (18): 2927-35, 2014.24898093
Lund L, Ross L, Petersen MA, et al.: Cancer caregiving tasks and consequences and their associations with caregiver status and the caregiver's relationship to the patient: a survey. BMC Cancer 14: 541, 2014.25069703
Ge L, Mordiffi SZ: Factors Associated With Higher Caregiver Burden Among Family Caregivers of Elderly Cancer Patients: A Systematic Review. Cancer Nurs 40 (6): 471-478, 2017 Nov/Dec.29045247
Stetz KM: Caregiving demands during advanced cancer. The spouse's needs. Cancer Nurs 10 (5): 260-8, 1987.3500774
Semere W, Althouse AD, Rosland AM, et al.: Poor patient health is associated with higher caregiver burden for older adults with advanced cancer. J Geriatr Oncol 12 (5): 771-778, 2021.33478890
Kim Y, van Ryn M, Jensen RE, et al.: Effects of gender and depressive symptoms on quality of life among colorectal and lung cancer patients and their family caregivers. Psychooncology 24 (1): 95-105, 2015.24831223
Decadt I, Laenen A, Celus J, et al.: Caregiver distress and quality of life in primary caregivers of oncology patients in active treatment and follow-up. Eur J Cancer Care (Engl) 30 (3): e13399, 2021.33393137
Schrank B, Ebert-Vogel A, Amering M, et al.: Gender differences in caregiver burden and its determinants in family members of terminally ill cancer patients. Psychooncology 25 (7): 808-14, 2016.26477788
Scherbring M: Effect of caregiver perception of preparedness on burden in an oncology population. Oncol Nurs Forum 29 (6): E70-6, 2002.12096297
Given CW, Stommel M, Given B, et al.: The influence of cancer patients' symptoms and functional states on patients' depression and family caregivers' reaction and depression. Health Psychol 12 (4): 277-85, 1993.8404801
Schulz R, Beach SR: Caregiving as a risk factor for mortality: the Caregiver Health Effects Study. JAMA 282 (23): 2215-9, 1999.10605972
Cameron JI, Franche RL, Cheung AM, et al.: Lifestyle interference and emotional distress in family caregivers of advanced cancer patients. Cancer 94 (2): 521-7, 2002.11900237 21896910
Given B, Sherwood PR: Family care for the older person with cancer. Semin Oncol Nurs 22 (1): 43-50, 2006.16458182
Pinquart M, Sörensen S: Ethnic differences in stressors, resources, and psychological outcomes of family caregiving: a meta-analysis. Gerontologist 45 (1): 90-106, 2005.15695420
Li H: Barriers to and unmet needs for supportive services: experiences of Asian-American caregivers. J Cross Cult Gerontol 19 (3): 241-60, 2004.15243200
Ngo-Metzger Q, McCarthy EP, Burns RB, et al.: Older Asian Americans and Pacific Islanders dying of cancer use hospice less frequently than older white patients. Am J Med 115 (1): 47-53, 2003.12867234
Guarnaccia PJ, Parra P: Ethnicity, social status, and families' experiences of caring for a mentally ill family member. Community Ment Health J 32 (3): 243-60, 1996.8790967
Cox C, Monk A: Strain among caregivers: comparing the experiences of African American and Hispanic caregivers of Alzheimer's relatives. Int J Aging Hum Dev 43 (2): 93-105, 1996.8945642
Covinsky KE, Eng C, Lui LY, et al.: Reduced employment in caregivers of frail elders: impact of ethnicity, patient clinical characteristics, and caregiver characteristics. J Gerontol A Biol Sci Med Sci 56 (11): M707-13, 2001.11682579
Hayman JA, Langa KM, Kabeto MU, et al.: Estimating the cost of informal caregiving for elderly patients with cancer. J Clin Oncol 19 (13): 3219-25, 2001.11432889
Xu H, Kadambi S, Mohile SG, et al.: Caregiving burden of informal caregivers of older adults with advanced cancer: The effects of rurality and education. J Geriatr Oncol 12 (7): 1015-1021, 2021.33858803
de Moor JS, Dowling EC, Ekwueme DU, et al.: Employment implications of informal cancer caregiving. J Cancer Surviv 11 (1): 48-57, 2017.27423439
Mazanec SR, Daly BJ, Douglas SL, et al.: Work productivity and health of informal caregivers of persons with advanced cancer. Res Nurs Health 34 (6): 483-95, 2011.21953274
Grunfeld E, Coyle D, Whelan T, et al.: Family caregiver burden: results of a longitudinal study of breast cancer patients and their principal caregivers. CMAJ 170 (12): 1795-801, 2004.15184333
Lambert-Obry V, Gouault-Laliberté A, Castonguay A, et al.: Real-world patient- and caregiver-reported outcomes in advanced breast cancer. Curr Oncol 25 (4): e282-e290, 2018.30111973
Van Houtven CH, Ramsey SD, Hornbrook MC, et al.: Economic burden for informal caregivers of lung and colorectal cancer patients. Oncologist 15 (8): 883-93, 2010.20667966
Siefert ML, Williams AL, Dowd MF, et al.: The caregiving experience in a racially diverse sample of cancer family caregivers. Cancer Nurs 31 (5): 399-407, 2008 Sep-Oct.18772665
Li C, Zeliadt SB, Hall IJ, et al.: Burden among partner caregivers of patients diagnosed with localized prostate cancer within 1 year after diagnosis: an economic perspective. Support Care Cancer 21 (12): 3461-9, 2013.23955026
Chen ML: The Growing Costs and Burden of Family Caregiving of Older Adults: A Review of Paid Sick Leave and Family Leave Policies. Gerontologist 56 (3): 391-6, 2016.25335873
Kim Y, Baker F, Spillers RL, et al.: Psychological adjustment of cancer caregivers with multiple roles. Psychooncology 15 (9): 795-804, 2006.16502472
Fenton ATHR, Keating NL, Ornstein KA, et al.: Comparing adult-child and spousal caregiver burden and potential contributors. Cancer 128 (10): 2015-2024, 2022.35285946
Ang WH, Lang SP, Ang E, et al.: Transition journey from hospital to home in patients with cancer and their caregivers: a qualitative study. Support Care Cancer 24 (10): 4319-26, 2016.27178439
Rocío L, Rojas EA, González MC, et al.: Experiences of patient-family caregiver dyads in palliative care during hospital-to-home transition process. Int J Palliat Nurs 23 (7): 332-339, 2017.28756752
Geddie PI, Wochna Loerzel V, Norris AE: Family Caregiver Knowledge, Patient Illness Characteristics, and Unplanned Hospital Admissions in Older Adults With Cancer. Oncol Nurs Forum 43 (4): 453-63, 2016.27314188
Tanco K, Prado B, Qian Y, et al.: A Comparison of Caregiver Burden of Patients with Advanced Cancer in Different Palliative Cancer Care Settings. J Palliat Med 24 (12): 1766-1775, 2021.33926226

## Coping Strategies and Self-Efficacy

As conceptualized, coping strategies mediate the relationship between positive or negative consequences and the perception that the demands of caregiving exceed the available resources. One group of investigators interviewed and surveyed 50 family caregivers of cancer patients receiving palliative care.[1] The aim was to describe the relationships between coping strategies and anxiety in caregivers. Anxiety was common in caregivers (76%). Emotion-based coping was associated with less anxiety, while dysfunctional coping was associated with increased anxiety. Perceived burden was also associated with increased anxiety.

As shown in the Transactional Model of Stress and Coping, caregivers and patients are interconnected. Evidence demonstrates a link between patient coping style and caregiver adjustment. A cross-sectional study of baseline data from a trial of subspecialty palliative care confirmed the relationship in 275 family caregivers of patients with incurable lung or colorectal cancer.[2] The investigators demonstrated that caregivers experienced greater depressive symptoms when patients used emotional support coping or expressed optimism about their prognosis. Among patients, less use of emotional support coping was associated with greater caregiver anxiety.

This interconnectedness between caregiver and patient also involves threat appraisal (the first step in the Transactional Model of Stress and Coping). A study of 484 dyads demonstrated that patient and caregiver symptom distress influenced their own, and in some cases each other’s, cognitive appraisals.[3]

### References

Perez-Ordóñez F, Frías-Osuna A, Romero-Rodríguez Y, et al.: Coping strategies and anxiety in caregivers of palliative cancer patients. Eur J Cancer Care (Engl) 25 (4): 600-7, 2016.27099167
Nipp RD, El-Jawahri A, Fishbein JN, et al.: Factors associated with depression and anxiety symptoms in family caregivers of patients with incurable cancer. Ann Oncol 27 (8): 1607-12, 2016.27177859
Ellis KR, Janevic MR, Kershaw T, et al.: The influence of dyadic symptom distress on threat appraisals and self-efficacy in advanced cancer and caregiving. Support Care Cancer 25 (1): 185-194, 2017.27631435

## Assessment of Caregivers

Caregiver assessment can be performed at any point of contact within the health care system. Ideally, a comprehensive caregiver assessment should be performed when the following occurs:[1]

- The patient is first diagnosed with cancer.
- The patient presents in the emergency department.
- A major transition is planned.

In systems where caregivers are assessed, practitioners can acknowledge caregivers as valued members of the health care team. Caregiver assessment can identify family members most at risk of developing physical and mental health difficulties, so that additional services can be planned accordingly.[1]

Multiple instruments to measure caregiver burden are available, including the Zarit Burden Interview,[2] among others.[3-10] Objective measures of caregiver burden comprise variables such as the number of hours spent providing care and a count of tasks the caregiver performs.[11][Level of evidence: II][12] Objective measures are usually short and easy to answer, often pointing to a clear direction for problem solving and direct intervention.[13] Caregiver assessment should reflect culturally competent practices.[14]

Although there are many tools for measuring caregiver burden, a review [15] found only eight tools in English for the psychometric evaluation of cancer caregivers. Of the eight, the Caregiver Reaction Assessment and Caregiver Quality of Life Index-Cancer had the best psychometric performance. Additionally, 16 conceptual domains within five overarching themes were identified across the eight instruments. Although the tools showed overlap in several domains, no single tool measured all domains. In assessing caregiver burden, it is prudent to use two or more instruments to obtain an evaluation across all domains.

### References

Feinberg LF: Caregiver assessment. Am J Nurs 108 (9 Suppl): 38-9, 2008.18797223
Zarit SH, Reever KE, Bach-Peterson J: Relatives of the impaired elderly: correlates of feelings of burden. Gerontologist 20 (6): 649-55, 1980.7203086
Glajchen M, Kornblith A, Homel P, et al.: Development of a brief assessment scale for caregivers of the medically ill. J Pain Symptom Manage 29 (3): 245-54, 2005.15781175
Weitzner MA, Jacobsen PB, Wagner H, et al.: The Caregiver Quality of Life Index-Cancer (CQOLC) scale: development and validation of an instrument to measure quality of life of the family caregiver of patients with cancer. Qual Life Res 8 (1-2): 55-63, 1999.10457738
Weitzner MA, McMillan SC: The Caregiver Quality of Life Index-Cancer (CQOLC) Scale: revalidation in a home hospice setting. J Palliat Care 15 (2): 13-20, 1999.10425873
Given CW, Given B, Stommel M, et al.: The caregiver reaction assessment (CRA) for caregivers to persons with chronic physical and mental impairments. Res Nurs Health 15 (4): 271-83, 1992.1386680
Robinson BC: Validation of a Caregiver Strain Index. J Gerontol 38 (3): 344-8, 1983.6841931
Minaya P, Baumstarck K, Berbis J, et al.: The CareGiver Oncology Quality of Life questionnaire (CarGOQoL): development and validation of an instrument to measure the quality of life of the caregivers of patients with cancer. Eur J Cancer 48 (6): 904-11, 2012.22033328
Wells DK, James K, Stewart JL, et al.: The care of my child with cancer: a new instrument to measure caregiving demand in parents of children with cancer. J Pediatr Nurs 17 (3): 201-10, 2002.12094361
Zaleta AK, Miller MF, Fortune EE, et al.: CancerSupportSourceTM -Caregiver: Development of a distress screening measure for cancer caregivers. Psychooncology 32 (3): 418-428, 2023.36604371
Bookwala J, Schulz R: A comparison of primary stressors, secondary stressors, and depressive symptoms between elderly caregiving husbands and wives: the Caregiver Health Effects Study. Psychol Aging 15 (4): 607-16, 2000.11144320
Gaugler JE, Hanna N, Linder J, et al.: Cancer caregiving and subjective stress: a multi-site, multi-dimensional analysis. Psychooncology 14 (9): 771-85, 2005.15750995
Honea NJ, Brintnall R, Given B, et al.: Putting Evidence into Practice: nursing assessment and interventions to reduce family caregiver strain and burden. Clin J Oncol Nurs 12 (3): 507-16, 2008.18515250
Pinquart M, Sörensen S: Ethnic differences in stressors, resources, and psychological outcomes of family caregiving: a meta-analysis. Gerontologist 45 (1): 90-106, 2005.15695420
Shilling V, Matthews L, Jenkins V, et al.: Patient-reported outcome measures for cancer caregivers: a systematic review. Qual Life Res 25 (8): 1859-76, 2016.26872911

## The Needs of Caregivers During the Cancer Trajectory

The cancer experience can be viewed in several distinct phases, from screening to diagnosis to treatment to either long-term survivorship or the end of life.[1] The phases differ in likely activities, goals, and outcomes for the patient. It seems reasonable to assume that the experiences of the caregiver also vary, given the interdependence of caregiver and patient.

### Studies Comparing Caregivers at Different Points in the Cancer Trajectory

Few studies directly compare caregivers of cancer patients across the disease trajectory or patients at different stages of disease. One research group conducted a qualitative study and interviewed 15 cancer caregivers before, during, and 4 months after bone marrow transplant. Although the exemplars varied across the trajectory, two consistent themes emerged: caregivers' uncertainty and the need for more information.[2]

Another study compared the results of two cross-sectional studies of caregivers of cancer patients who were in the late palliative phase or were attending a pain clinic (which the authors termed the curative phase).[3] The authors found no differences in the mean scores of the Hospital Anxiety and Depression Scale or the Medical Outcomes Study 36-Item Short Form Health Survey as measures of quality of life (QOL). The results should be interpreted with caution, given the different inclusion criteria and different time periods of the study. Furthermore, the group means may obscure meaningful changes in individual caregivers over time.

A separate analysis demonstrated that symptom burdens in patients did not vary between cohorts, but both groups scored high on measures of weakness and fatigue.[4] Caregivers reported higher rates of depression when patients had insomnia, but the association did not vary between cohorts. However, the methodology of the studies limits the drawing of firm conclusions.

In a cross-sectional study of 1,580 caregivers of patients with different cancer types, caregivers of patients undergoing active treatment had a significantly lower mean score on the Distress Thermometer than caregivers of patients in follow-up.[5][Level of evidence: II] Mean scores on another measure of caregiver distress, the Caregiver Risk Screen, were not significantly different across groups. Conversely, caregivers of patients undergoing active treatment reported significantly worse QOL on the Caregiver Quality of Life Index–Cancer than caregivers of patients in follow-up. One possible explanation for these findings is that while patients’ physical and practical needs may decrease after treatment, caregivers may experience heightened uncertainty and fear of cancer recurrence during survivorship.[6,7]

### Survivorship

The evidence demonstrates that although the prevalence of unmet needs diminishes over time, many caregivers continue to experience needs related to the cancer experience during the survivorship phase.

For example, a longitudinal study was designed to track the psychosocial, financial, and occupational impact of having ongoing needs as a caregiver in Australia.[8] The investigators analyzed responses to the Supportive Care Needs Survey—Partners and Caregivers (SCNS–P&C) from 547 caregivers at 6 months, 519 caregivers at 12 months, and 443 caregivers at 24 months after the cancer diagnosis. Of note, 444 of the original 547 participants completed surveys at 12 months, and 372 completed surveys at 24 months.

Several findings deserve emphasis:

- The proportion of caregivers reporting any unmet need decreased from 50.2% at 6 months to 30.7% at 24 months.
- A similar decline was seen for caregivers who reported at least five or ten unmet needs, although the baseline prevalence was lower.
- The most pressing unmet needs were related to concerns about cancer recurrence, reducing stress in the survivor’s life, and understanding the survivor’s experience.
- Unmet needs were negatively associated with caregivers’ well-being (although not uniformly).

In a longitudinal study of 120 dyads of patients with hepatobiliary or pancreatic cancer and their caregivers, at diagnosis 25% of caregivers reported high levels of chronic depressive symptoms, and 21% had high levels of stress.[9][Level of evidence: II] Levels of depressive symptoms and stress at diagnosis remained high up to 18 months postdiagnosis, while those with low to moderate levels of depressive symptoms and stress at diagnosis saw those levels decline over time. Patient depressive symptoms also predicted caregiver stress. These findings suggest that caregivers with higher levels of depressive symptoms and stress at diagnosis may be the most vulnerable over time, but further research is needed in more diverse samples, as most caregivers were women (85%). Similarly, a 2021 study found that in 111 caregivers of newly diagnosed cancer patients, poorer caregiver QOL was associated with higher levels of caregiver depression, anxiety, and stress, and that caregiver QOL and levels of social support changed over the treatment trajectory.[10][Level of evidence: II]

### End of Life

The end-of-life experiences of patients with advanced cancer influence the burden on caregivers and their eventual psychological adjustment during bereavement. A longitudinal study of caregivers of women with advanced-stage ovarian cancer provides valuable insights into the caregiver’s experience in the last year of the patient’s life.[11] Ninety-nine caregivers completed measures every 3 months for 2 years. The caregivers reported lower-than-expected mental and physical QOL. The average distress level and number of unmet needs increased over time. Perceived social support did not change. Caregiver distress was predicted by lower optimism, higher unmet needs, and shortened time to patient death. Patient QOL was not a predictor. In the last 6 months of the patient’s life, managing emotions about poor prognosis and balancing work with caregiving demands were related to high unmet needs among caregivers.

One potential source of caregiver distress toward the end of life is the ambiguity around caregivers' role in decisions to limit potentially life-sustaining treatments such as chemotherapy or resuscitation. Two studies provide clarifying observations.[12,13] One study embedded researchers during hospitalizations of patients with advanced cancer to record the participation of caregivers in decisions to limit treatment.[12] The investigators identified 70 patients, but only 63 had caregivers present. In the cohort, only 32% of relatives were involved, both positively and negatively. Clinicians were more often aware of patients’ preferences when relatives were present (78% vs. 29%, P = .014). However, caregivers did not always agree with patients and, in one-third of the observations, contradicted the patients. Thus, caregivers may be a source of insight but do not necessarily accurately reflect patients’ wishes.

The caregiver’s importance to the decision-making process may vary based on clinicians’ attitudes. In an interview study of oncology physicians and nurses, two broad perspectives were found: maintaining patient autonomy independent of caregiver influence and facilitating decision-making by actively involving caregivers seeking consensus.[13] These perspectives were based on a desire to enhance the positive aspects of caregivers’ support (e.g., emotional, encouragement to plan, and understanding of information) while minimizing the potential barriers (e.g., family reluctance to accept the patient is at the end of life, the need to mediate conflicts, and the increased time required to include caregivers). These findings highlight the potential value of caregivers and the need to develop specific strategies for including them in end-of-life discussions.

Hospice care can provide critical support to caregivers as well as patients. One group of investigators compared the burden and QOL of caregivers of patients with advanced cancer who were receiving active treatment with the burden and QOL of caregivers of patients who were receiving hospice care.[14] The goal was to characterize the demands unique to the hospice phase of care. The investigators found no difference in the perceived burden of caregiving and increased role limitations due to mental or emotional challenges. However, caregivers in the hospice group reported fewer physical limitations. Similarly, another group reported that longer hospice stays were associated with better patient QOL and better caregiver adjustment during bereavement.[15]

A potential explanation for the benefit of hospice is that caregivers are reassured by the higher quality of end-of-life care and the honoring of patients’ goals. One study analyzed interviews with 1,146 family members of Medicare beneficiaries who died of advanced-stage lung or colorectal cancer.[16] The results demonstrated that hospice enrollment was associated with more “excellent” ratings for quality of care reported by family members. Similarly, patients who received intensive care or had short hospice enrollments were less frequently reported to have died in their preferred place.[17] For more information, see Hospice.

Caregivers may also require support to effectively participate in decisions about whether to provide patients with artificial nutrition or hydration (ANH). Investigators conducted a prospective cross-sectional survey of 39 patients with advanced cancer and 30 relatives about their views on ANH.[18] Only 24% of relatives stated they would opt out of ANH if deciding on behalf of their loved ones, and 48% were against hydration. Patients were less concerned than their relatives about adverse physical symptoms such as pain, agitation, and hunger. Patients endorsed their family members’ opinions as important in these decisions. For more information, see the Artificial Hydration section in Last Days of Life.

### References

Levit LA, Balogh EP, Nass SJ, et al., eds.: Delivering High-Quality Cancer Care: Charting a New Course for a System in Crisis. The National Academies Press, 2013. Also available online (https://www.nap.edu/read/18359/chapter/1). Last accessed May 1, 2025.
Von Ah D, Spath M, Nielsen A, et al.: The Caregiver's Role Across the Bone Marrow Transplantation Trajectory. Cancer Nurs 39 (1): E12-9, 2016 Jan-Feb.25785581
Grov EK, Valeberg BT: Does the cancer patient's disease stage matter? A comparative study of caregivers' mental health and health related quality of life. Palliat Support Care 10 (3): 189-96, 2012.22436126
Valeberg BT, Grov EK: Symptoms in the cancer patient: of importance for their caregivers' quality of life and mental health? Eur J Oncol Nurs 17 (1): 46-51, 2013.22386554
Decadt I, Laenen A, Celus J, et al.: Caregiver distress and quality of life in primary caregivers of oncology patients in active treatment and follow-up. Eur J Cancer Care (Engl) 30 (3): e13399, 2021.33393137
Shilling V, Starkings R, Jenkins V, et al.: The pervasive nature of uncertainty-a qualitative study of patients with advanced cancer and their informal caregivers. J Cancer Surviv 11 (5): 590-603, 2017.28721677
Balfe M, O'Brien K, Timmons A, et al.: The unmet supportive care needs of long-term head and neck cancer caregivers in the extended survivorship period. J Clin Nurs 25 (11-12): 1576-86, 2016.27139171
Girgis A, Lambert SD, McElduff P, et al.: Some things change, some things stay the same: a longitudinal analysis of cancer caregivers' unmet supportive care needs. Psychooncology 22 (7): 1557-64, 2013.22941765
Chen Q, Terhorst L, Geller DA, et al.: Trajectories and predictors of stress and depressive symptoms in spousal and intimate partner cancer caregivers. J Psychosoc Oncol 38 (5): 527-542, 2020 Sep-Oct.32367788
Peh CX, Liu J, Mahendran R: Quality of life and emotional distress among caregivers of patients newly diagnosed with cancer: Understanding trajectories across the first year post-diagnosis. J Psychosoc Oncol 38 (5): 557-572, 2020 Sep-Oct.32367769
Butow PN, Price MA, Bell ML, et al.: Caring for women with ovarian cancer in the last year of life: a longitudinal study of caregiver quality of life, distress and unmet needs. Gynecol Oncol 132 (3): 690-7, 2014.24423880
Hauke D, Reiter-Theil S, Hoster E, et al.: The role of relatives in decisions concerning life-prolonging treatment in patients with end-stage malignant disorders: informants, advocates or surrogate decision-makers? Ann Oncol 22 (12): 2667-2674, 2011.21427061
Laryionava K, Hauke D, Heußner P, et al.: "Often Relatives are the Key […]" -Family Involvement in Treatment Decision Making in Patients with Advanced Cancer Near the End of Life. Oncologist 26 (5): e831-e837, 2021.33037846
Spatuzzi R, Giulietti MV, Ricciuti M, et al.: Quality of life and burden in family caregivers of patients with advanced cancer in active treatment settings and hospice care: A comparative study. Death Stud 41 (5): 276-283, 2017 May-Jun.27982741
Wright AA, Zhang B, Ray A, et al.: Associations between end-of-life discussions, patient mental health, medical care near death, and caregiver bereavement adjustment. JAMA 300 (14): 1665-73, 2008.18840840
Wright AA, Keating NL, Ayanian JZ, et al.: Family Perspectives on Aggressive Cancer Care Near the End of Life. JAMA 315 (3): 284-92, 2016.26784776
Wright AA, Keating NL, Balboni TA, et al.: Place of death: correlations with quality of life of patients with cancer and predictors of bereaved caregivers' mental health. J Clin Oncol 28 (29): 4457-64, 2010.20837950
Bükki J, Unterpaul T, Nübling G, et al.: Decision making at the end of life--cancer patients' and their caregivers' views on artificial nutrition and hydration. Support Care Cancer 22 (12): 3287-99, 2014.25084741

## Interventions to Prevent, Reduce, or Ameliorate Caregiver Burden

Many types of interventions have been tested to address the needs of informal caregivers.[1-3] The interventions have focused on improving outcomes for the individual patient, caregiver, or patient-caregiver dyad.[1] The types of interventions and their goals include the following:

- Cognitive behavioral therapy (CBT): To use psychoeducational and social interventions to reduce caregiver burden and feelings of distress.
- Complementary and alternative medicine therapies: To reduce caregiver distress and burden through guided imagery, reflexology, reminiscence therapy, massage therapy, and healing touch.
- Family/couples therapy: To improve the functioning of the couple and family unit.
- Interpersonal therapy: To provide individual counseling to reduce the psychological consequences of caregiving burdens.
- Problem solving and skill building: To develop caregiving skills, including the ability to assess and manage patients’ symptoms, identify solutions to caregiving problems, and enhance caregivers’ ability to cope with cancer caregiving roles and responsibilities.
- Psychoeducational: To address the information needs of cancer caregivers, including information related to diagnosis, prognosis, coping, self-care, home care, impact on partners and family, and hospital care or follow-up and rehabilitation.[4]
- Subspecialty palliative care: To directly address caregivers’ concerns and improve their outcomes by improving patient outcomes.
- Supportive therapy: To address the emotional needs of informal caregivers.

The efficacy of these interventions has been mixed. Findings from a few meta-analyses have identified small to medium positive effects of psychosocial-educational interventions on caregivers and on patient-caregiver outcomes.[5-7] However, many studies are limited by small sample sizes and short assessments, and outcomes often vary depending on the study focus (patient vs. caregiver vs. patient-caregiver dyads).[1]

### Meta-analyses

One meta-analysis of 29 randomized clinical trials published from 1983 to 2009 [6] identified the following three major types of interventions:

- Psychoeducational.
- Skill building/problem solving.
- Therapeutic counseling.

The authors used a conceptual framework to organize the outcome data, integrating stress and coping theory, CBT, and quality of life (QOL) frameworks. Overall, all three interventions showed small to moderate effects for improving the following outcomes:

- Caregiver burden (11 studies; overall effect size, Hedge's g [g] = 0.22).
- Caregivers’ ability to cope (10 studies; overall effect size, g = 0.47 within the first 3 months, which remained significant 3 to 6 months later [overall effect size, g = 0.20] and 6 months later [g = 0.35]).
- Self-efficacy (8 studies; overall effect size, g = 0.25, which remained significant at 3 to 6 months’ follow-up [g = 0.20] and beyond).
- Aspects of QOL, including physical functioning (7 studies; g = 0.22 at 3 to 6 months’ follow-up and g = 0.26 at 6 months’ follow-up), distress and anxiety (16 studies; g = 0.20 during the first 3 months), and marital/family relationships (10 studies; g = 0.20). There was no significant improvement in depression or social functioning.

A follow-up systematic review of the literature identified 49 intervention studies that addressed caregiver demands and burden.[3] Eight different types of interventions were noted, with most studies categorized as psychoeducational, problem solving, supportive therapy, and family and couples therapy. The authors noted only three studies that used CBT. However, all three studies using CBT noted significant improvement in psychological functioning in informal caregivers. Overall, programs that were structured, integrative, and goal oriented appeared to offer the greatest benefits.[3]

This initial work was expanded upon with a synthesis and meta-analyses of the effectiveness of CBT for improving psychological functioning in informal caregivers.[2] The authors identified a small statistical effect of CBT (g = 0.08). However, this effect disappeared when randomized controlled trials were reviewed alone. The authors suggested that the broad definition of CBT and variations in the definition of informal caregivers may have limited results.[2]

Two additional reviews focused on literature published up until 2016.[8,9] One group of investigators conducted a systematic review of 21 psychosocial interventions for improving QOL, depression, and anxiety in cancer caregivers.[8] This report and others have illustrated some noteworthy interventions used in multiple studies.

- Psychoeducational intervention: The FOCUS Program is an informational and support program that includes five core content areas: Family involvement, Optimistic attitude, Coping effectiveness, Uncertainty reduction, and Symptom management. This intervention has shown improvement in caregiver QOL in multiple randomized controlled trials.[10,11]
- Problem-solving intervention: COPE (Creativity, Optimism, Planning, Expert Information) is a problem-solving model, used by multiple investigators, that has shown improvement in caregiver QOL,[12,13] burden of patient symptoms, and caregiving task burden.[12] This program has also been used in combination with other cognitive behavioral trials with some success.[14]
- Psychoeducational and supportive therapy: CHESS (Comprehensive Health Enhancement Support System) is a web-based lung cancer information, communication, and coaching system for caregivers.[15] This program was tested in 285 informal caregivers of patients with advanced non-small cell lung cancer. Caregivers were randomly assigned to one of two groups. The comparison group received standard care plus a laptop computer with Internet access (if needed) and a list of lung cancer and palliative care websites. The treatment group received standard care plus a laptop computer and Internet access (if needed) and access to the CHESS lung cancer website, “Coping with Lung Cancer: A Network of Support.” Caregivers assigned to CHESS had small to moderate but significant effects in improved caregiver burden and negative mood. This study is a good example of using the Web to reach informal caregivers, who often cannot attend supportive training programs in person.

### Individual Studies

A few individual landmark studies have examined interventions for informal caregivers of people with cancer.

#### Overview of study limitations and unresolved questions

A number of limitations in studies to date prevent any conclusions about choosing an optimal intervention. Salient limitations include the following:

- The variation in intervention delivery across studies, from in-person sessions to telephone, online, or web-based applications.
- The lack of consensus regarding the definition of informal caregivers and types of interventions, making comparisons across studies difficult.
- The potential lack of scalability of interventions studied in a limited number of sites, leaving the unanswered question of how to provide interventions to rural populations and those with transportation concerns.
- The frequent lack of a match between the primary outcome measure and the target of the intervention. For example, interventions focused on problem solving often failed to assess improvement in the capacity to solve problems but instead measured more distal outcomes such as psychological adjustment. Such studies raise questions about attributing intervention effects.
- The unrecognized variations in the levels of caregiver burden or distress among study participants. Researchers noted that informal caregivers who were most distressed were more likely to decline to enroll in a trial or, if enrolled, often failed to complete the intervention, which affected the evaluation. In addition, investigators have suggested that efficacy has varied because of low baseline levels of caregiver burden and distress or inadequate follow-up, resulting in the inability to identify changes in levels of distress.

These limitations can be addressed in future studies:

- Use consensus definitions for informal caregivers and interventional categories.[2]
- Identify more-vulnerable caregiving populations (e.g., socially isolated caregivers, rural residents, older people, members of lower socioeconomic groups, and people with the most complicated care and needs).[1]
- Incorporate risk stratification to target highly stressed informal caregivers and patients.[1] Future studies may focus on those most in need to adequately demonstrate intervention effectiveness.
- Incorporate technology not only to improve interventions but also to improve access to interventional support.[1]

#### Overview of results of selected studies

The following two tables contain brief descriptions of noteworthy reports to aid in understanding potential interventions and benefits. Table 1 organizes studies by type of intervention and highlights positive and negative studies. As outlined in the previous section, however, methodological limitations prevent comparisons or conclusions.[1]

Table 1. Interventional Approaches for Informal Cancer Caregiving

Intervention Type | Positive Results | Negative Results
Psychoeducation | Improved knowledge and/or ability to provide care [16-22] | Unimproved mood (anxiety and distress) [23]
Psychoeducation | Improved psychological functioning (depression, anxiety, stress) and reduced caregiver burden [15,24-27] | No significant improvement in caregiver burden [28]
Psychoeducation | Improved patient-reported functional support and marital satisfaction [24] | Unimproved QOL [29]
Psychoeducation | Improved coping and mental health, decreased depressive symptoms, and lower risk of maladaptive coping [30] | N/A
Problem solving/skill building | Improved problem solving [31-36] | No decrease in IC depressive symptoms [37,38]
Problem solving/skill building | Improved IC confidence,[32] self-efficacy [36,37,39] | No improvement in IC coping or help seeking [40]
Problem solving/skill building | Improved psychological functioning (decreased IC depressive symptoms,[33] anxiety,[35] distress,[36] and negative affect [34]) | No improvement in IC coping or help seeking [40]
Problem solving/skill building | Decreased patient depressive symptoms [33] | No improvement in IC coping or help seeking [40]
Problem solving/skill building | Improved health outcomes (fatigue) [36] | No improvement in IC coping or help seeking [40]
Problem solving/skill building | Improved QOL [35] | No improvement in IC coping or help seeking [40]
Supportive therapy | Improved IC perception of support/knowledge [41] | No significant improvement in IC psychological functioning (depression, anxiety) [37,42]
Supportive therapy | Improved IC perception of support/knowledge [41] | Unimproved IC QOL [37,43]
Family/couples therapy | Improved marital functioning/relationships [44,45] | Unimproved state anxiety or traumatic stress or distress [46]
Family/couples therapy | Less IC-reported negative appraisals of caregiving [10,47] | Unimproved state anxiety or traumatic stress or distress [46]
Family/couples therapy | Improved communication skills [47] | Unimproved state anxiety or traumatic stress or distress [46]
Family/couples therapy | Improved psychological functioning (distress, depression, anxiety in ICs, patients) [45,48,49] | Unimproved state anxiety or traumatic stress or distress [46]
Family/couples therapy | Improved QOL [11,50] | Unimproved state anxiety or traumatic stress or distress [46]
Cognitive behavioral therapy | Improved psychological functioning (reductions in distress, depressive symptoms) [51-53] | N/A
Cognitive behavioral therapy | Decreased burden of cancer symptoms [12] | N/A
Cognitive behavioral therapy | Improved self-efficacy [54] | N/A
Cognitive behavioral therapy | Improved QOL [12] | N/A
Interpersonal therapy | Improved psychological functioning (decreased depression, anxiety) [55,56] | N/A
Interpersonal therapy | Improved QOL [56,57] | N/A
Integrative, alternative, and complementary therapy | Massage: improvements in IC depression, anxiety, fatigue [58] | N/A
Integrative, alternative, and complementary therapy | Strength training: improvements in mental health but approaching statistical significance [59] | N/A
Integrative, alternative, and complementary therapy | Mindfulness-based stress reduction: | N/A
Integrative, alternative, and complementary therapy | – Reduced caregiver burden but no significant reduction in psychological distress for patients and partners [60] | N/A
Integrative, alternative, and complementary therapy | – Significant improvement in patient psychological functioning (decreased stress, anxiety) and reduction but no statistical improvement in IC psychological functioning and QOL [61] | N/A

IC = informal caregiver; N/A = not applicable; QOL = quality of life.

Table 2 highlights some of the investigational studies that support the effectiveness of psychoeducational, problem-solving, and CBT interventions in which most of the work has been conducted. In addition, the table displays the outcomes (resources and coping) that were improved in each of these studies.

Table 2. Interventions and Resultant Outcomes: Selected Work

Intervention Type/References | Outcomes: Improved Resources and/or Coping
Psychoeducation | Knowledge of care/role | Problem solving | Self-efficacy | Psychological functioning | Symptoms | QOL
– Ferrell et al., 1995 [16] | X
– Horowitz et al., 1996 [25] | X | | | X
– DuBenske et al., 2014 [15] | | | | X
– Northouse et al., 2013 [11] | | | X | | | X
– Northouse et al., 2014 [50] | | | X | X | | X
– Badr et al., 2015 [26] | | | | X
Problem solving | Knowledge of care/role | Problem solving | Self-efficacy | Psychological functioning | Symptoms | QOL
– Sahler et al., 2002 [34] | X | X | | X
– Nezu et al., 2003 [33] | X | X | | X
– Cameron et al., 2004 [32] | X | X | X
– Bevans et al., 2010 [31] | X | X
– Demiris et al., 2012 [35] | | X | | X | | X
– Bevans et al., 2014 [36] | | X | X | X | X
Cognitive behavioral therapy | Knowledge of care/role | Problem solving | Self-efficacy | Psychological functioning | Symptoms | QOL
– Keefe et al., 2005 [54] | | | X
– Carter, 2006 [51] | | | | X
– Cohen et al., 2006 [52] | | | | X
– Given et al., 2006 [53] | | | | X | X
– McMillan et al., 2006 [12] | | | | | X | X

QOL = quality of life.

### References

Kent EE, Rowland JH, Northouse L, et al.: Caring for caregivers and patients: Research and clinical priorities for informal cancer caregiving. Cancer 122 (13): 1987-95, 2016.26991807
O'Toole MS, Zachariae R, Renna ME, et al.: Cognitive behavioral therapies for informal caregivers of patients with cancer and cancer survivors: a systematic review and meta-analysis. Psychooncology 26 (4): 428-437, 2017.27147198
Applebaum AJ, Breitbart W: Care for the cancer caregiver: a systematic review. Palliat Support Care 11 (3): 231-52, 2013.23046977
Adams E, Boulton M, Watson E: The information needs of partners and family members of cancer patients: a systematic literature review. Patient Educ Couns 77 (2): 179-86, 2009.19406609
Badr H, Krebs P: A systematic review and meta-analysis of psychosocial interventions for couples coping with cancer. Psychooncology 22 (8): 1688-704, 2013.23045191
Northouse LL, Katapodi MC, Song L, et al.: Interventions with family caregivers of cancer patients: meta-analysis of randomized trials. CA Cancer J Clin 60 (5): 317-39, 2010 Sep-Oct.20709946
Griffin JM, Meis LA, MacDonald R, et al.: Effectiveness of family and caregiver interventions on patient outcomes in adults with cancer: a systematic review. J Gen Intern Med 29 (9): 1274-82, 2014.24841557
Fu F, Zhao H, Tong F, et al.: A Systematic Review of Psychosocial Interventions to Cancer Caregivers. Front Psychol 8: 834, 2017.28596746
Frambes D, Given B, Lehto R, et al.: Informal Caregivers of Cancer Patients: Review of Interventions, Care Activities, and Outcomes. West J Nurs Res 40 (7): 1069-1097, 2018.28381113
Northouse L, Kershaw T, Mood D, et al.: Effects of a family intervention on the quality of life of women with recurrent breast cancer and their family caregivers. Psychooncology 14 (6): 478-91, 2005.15599947
Northouse LL, Mood DW, Schafenacker A, et al.: Randomized clinical trial of a brief and extensive dyadic intervention for advanced cancer patients and their family caregivers. Psychooncology 22 (3): 555-63, 2013.22290823
McMillan SC, Small BJ, Weitzner M, et al.: Impact of coping skills intervention with family caregivers of hospice patients with cancer: a randomized clinical trial. Cancer 106 (1): 214-22, 2006.16329131
Meyers FJ, Carducci M, Loscalzo MJ, et al.: Effects of a problem-solving intervention (COPE) on quality of life for patients with advanced cancer on clinical trials and their caregivers: simultaneous care educational intervention (SCEI): linking palliation and clinical trials. J Palliat Med 14 (4): 465-73, 2011.21413846
Dionne-Odom JN, Azuero A, Lyons KD, et al.: Benefits of Early Versus Delayed Palliative Care to Informal Family Caregivers of Patients With Advanced Cancer: Outcomes From the ENABLE III Randomized Controlled Trial. J Clin Oncol 33 (13): 1446-52, 2015.25800762
DuBenske LL, Gustafson DH, Namkoong K, et al.: CHESS improves cancer caregivers' burden and mood: results of an eHealth RCT. Health Psychol 33 (10): 1261-72, 2014.24245838
Ferrell BR, Grant M, Chan J, et al.: The impact of cancer pain education on family caregivers of elderly patients. Oncol Nurs Forum 22 (8): 1211-8, 1995.8532545
Hudson P, Quinn K, Kristjanson L, et al.: Evaluation of a psycho-educational group programme for family caregivers in home-based palliative care. Palliat Med 22 (3): 270-80, 2008.18477722
Derdiarian AK: Effects of information on recently diagnosed cancer patients' and spouses' satisfaction with care. Cancer Nurs 12 (5): 285-92, 1989.2804964
Pasacreta JV, Barg F, Nuamah I, et al.: Participant characteristics before and 4 months after attendance at a family caregiver cancer education program. Cancer Nurs 23 (4): 295-303, 2000.10939177
Grahn G, Danielson M: Coping with the cancer experience. II. Evaluating an education and support programme for cancer patients and their significant others. Eur J Cancer Care (Engl) 5 (3): 182-7, 1996.9117053
Tsianakas V, Robert G, Richardson A, et al.: Enhancing the experience of carers in the chemotherapy outpatient setting: an exploratory randomised controlled trial to test impact, acceptability and feasibility of a complex intervention co-designed by carers and staff. Support Care Cancer 23 (10): 3069-80, 2015.25744288
Valeberg BT, Kolstad E, Småstuen MC, et al.: The PRO-SELF pain control program improves family caregivers' knowledge of cancer pain management. Cancer Nurs 36 (6): 429-35, 2013 Nov-Dec.23154516
Cartledge Hoff A, Haaga DA: Effects of an education program on radiation oncology patients and families. J Psychosoc Oncol 23 (4): 61-79, 2005.16618688
Bultz BD, Speca M, Brasher PM, et al.: A randomized controlled trial of a brief psychoeducational support group for partners of early stage breast cancer patients. Psychooncology 9 (4): 303-13, 2000 Jul-Aug.10960928
Horowitz S, Passik SD, Malkin MG: “In sickness and in health”: a group intervention for spouses caring for patients with brain tumors. Journal of Psychosocial Oncology 14 (2): 43-56, 1996.
Badr H, Smith CB, Goldstein NE, et al.: Dyadic psychosocial intervention for advanced lung cancer patients and their family caregivers: results of a randomized pilot trial. Cancer 121 (1): 150-8, 2015.25209975
Laudenslager ML, Simoneau TL, Kilbourn K, et al.: A randomized control trial of a psychosocial intervention for caregivers of allogeneic hematopoietic stem cell transplant patients: effects on distress. Bone Marrow Transplant 50 (8): 1110-8, 2015.25961767
O'Hara RE, Hull JG, Lyons KD, et al.: Impact on caregiver burden of a patient-focused palliative care intervention for patients with advanced cancer. Palliat Support Care 8 (4): 395-404, 2010.20875202
Perz J, Ussher JM; Australian Cancer and Sexuality Study Team: A randomized trial of a minimal intervention for sexual concerns after cancer: a comparison of self-help and professionally delivered modalities. BMC Cancer 15: 629, 2015.26353787
Koehler M, Hoppe S, Kropf S, et al.: Randomized Trial of a Supportive Psychotherapy for Parents of Adolescents and Young Adults With Hematologic Malignancies. J Natl Compr Canc Netw 20 (13): , 2022.35405661
Bevans M, Castro K, Prince P, et al.: An individualized dyadic problem-solving education intervention for patients and family caregivers during allogeneic hematopoietic stem cell transplantation: a feasibility study. Cancer Nurs 33 (2): E24-32, 2010 Mar-Apr.20142739
Cameron JI, Shin JL, Williams D, et al.: A brief problem-solving intervention for family caregivers to individuals with advanced cancer. J Psychosom Res 57 (2): 137-43, 2004.15465067
Nezu AM, Nezu CM, Felgoise SH, et al.: Project Genesis: assessing the efficacy of problem-solving therapy for distressed adult cancer patients. J Consult Clin Psychol 71 (6): 1036-48, 2003.14622079
Sahler OJ, Varni JW, Fairclough DL, et al.: Problem-solving skills training for mothers of children with newly diagnosed cancer: a randomized trial. J Dev Behav Pediatr 23 (2): 77-86, 2002.11943969
Demiris G, Parker Oliver D, Wittenberg-Lyles E, et al.: A noninferiority trial of a problem-solving intervention for hospice caregivers: in person versus videophone. J Palliat Med 15 (6): 653-60, 2012.22536989
Bevans M, Wehrlen L, Castro K, et al.: A problem-solving education intervention in caregivers and patients during allogeneic hematopoietic stem cell transplantation. J Health Psychol 19 (5): 602-17, 2014.23471761
Hendrix C, Tepfer S, Forest S, et al.: Transitional Care Partners: a hospital-to-home support for older adults and their caregivers. J Am Assoc Nurse Pract 25 (8): 407-14, 2013.24170636
Kurtz ME, Kurtz JC, Given CW, et al.: A randomized, controlled trial of a patient/caregiver symptom control intervention: effects on depressive symptomatology of caregivers of cancer patients. J Pain Symptom Manage 30 (2): 112-22, 2005.16125026
Hendrix CC, Bailey DE, Steinhauser KE, et al.: Effects of enhanced caregiver training program on cancer caregiver's self-efficacy, preparedness, and psychological well-being. Support Care Cancer 24 (1): 327-36, 2016.26062925
Toseland RW, Blanchard CG, McCallion P: A problem solving intervention for caregivers of cancer patients. Soc Sci Med 40 (4): 517-28, 1995.7725125
Milberg A, Rydstrand K, Helander L, et al.: Participants' experiences of a support group intervention for family members during ongoing palliative home care. J Palliat Care 21 (4): 277-84, 2005.16483097
Kozachik SL, Given CW, Given BA, et al.: Improving depressive symptoms among caregivers of patients with cancer: results of a randomized clinical trial. Oncol Nurs Forum 28 (7): 1149-57, 2001.11517848
Walsh K, Jones L, Tookman A, et al.: Reducing emotional distress in people caring for patients receiving specialist palliative care. Randomised trial. Br J Psychiatry 190: 142-7, 2007.17267931
Baucom DH, Porter LS, Kirby JS, et al.: A couple-based intervention for female breast cancer. Psychooncology 18 (3): 276-83, 2009.18702064
McLean LM, Jones JM, Rydall AC, et al.: A couples intervention for patients facing advanced cancer and their spouse caregivers: outcomes of a pilot study. Psychooncology 17 (11): 1152-6, 2008.18213694
Stehl ML, Kazak AE, Alderfer MA, et al.: Conducting a randomized clinical trial of an psychological intervention for parents/caregivers of children with cancer shortly after diagnosis. J Pediatr Psychol 34 (8): 803-16, 2009.19091806
Northouse LL, Mood DW, Schafenacker A, et al.: Randomized clinical trial of a family intervention for prostate cancer patients and their spouses. Cancer 110 (12): 2809-18, 2007.17999405
Kissane DW, McKenzie M, Bloch S, et al.: Family focused grief therapy: a randomized, controlled trial in palliative care and bereavement. Am J Psychiatry 163 (7): 1208-18, 2006.16816226
Scott JL, Halford WK, Ward BG: United we stand? The effects of a couple-coping intervention on adjustment to early stage breast or gynecological cancer. J Consult Clin Psychol 72 (6): 1122-35, 2004.15612858
Northouse L, Schafenacker A, Barr KL, et al.: A tailored Web-based psychoeducational intervention for cancer patients and their family caregivers. Cancer Nurs 37 (5): 321-30, 2014 Sep-Oct.24945270
Carter PA: A brief behavioral sleep intervention for family caregivers of persons with cancer. Cancer Nurs 29 (2): 95-103, 2006 Mar-Apr.16565618
Cohen M, Kuten A: Cognitive-behavior group intervention for relatives of cancer patients: a controlled study. J Psychosom Res 61 (2): 187-96, 2006.16880021
Given B, Given CW, Sikorskii A, et al.: The impact of providing symptom management assistance on caregiver reaction: results of a randomized trial. J Pain Symptom Manage 32 (5): 433-43, 2006.17085269
Keefe FJ, Ahles TA, Sutton L, et al.: Partner-guided cancer pain management at the end of life: a preliminary study. J Pain Symptom Manage 29 (3): 263-72, 2005.15781177
Badger T, Segrin C, Dorros SM, et al.: Depression and anxiety in women with breast cancer and their partners. Nurs Res 56 (1): 44-53, 2007 Jan-Feb.17179873
Badger TA, Segrin C, Hepworth JT, et al.: Telephone-delivered health education and interpersonal counseling improve quality of life for Latinas with breast cancer and their supportive partners. Psychooncology 22 (5): 1035-42, 2013.22573418
Badger T, Segrin C, Pasvogel A, et al.: The effect of psychosocial interventions delivered by telephone and videophone on quality of life in early-stage breast cancer survivors and their supportive partners. J Telemed Telecare 19 (5): 260-5, 2013.24163235
Rexilius SJ, Mundt C, Erickson Megel M, et al.: Therapeutic effects of massage therapy and handling touch on caregivers of patients undergoing autologous hematopoietic stem cell transplant. Oncol Nurs Forum 29 (3): E35-44, 2002.11979292
Winters-Stone KM, Lyons KS, Dobek J, et al.: Benefits of partnered strength training for prostate cancer survivors and spouses: results from a randomized controlled trial of the Exercising Together project. J Cancer Surviv 10 (4): 633-44, 2016.26715587
van den Hurk DG, Schellekens MP, Molema J, et al.: Mindfulness-Based Stress Reduction for lung cancer patients and their partners: Results of a mixed methods pilot study. Palliat Med 29 (7): 652-60, 2015.25701663
Lengacher CA, Kip KE, Barta M, et al.: A pilot study evaluating the effect of mindfulness-based stress reduction on psychological status, physical status, salivary cortisol, and interleukin-6 among advanced-stage cancer patients and their caregivers. J Holist Nurs 30 (3): 170-85, 2012.22442202

## Interventions for Caregivers During the Cancer Trajectory

### Subspecialty Palliative Care

As previously described in this summary, the mental and physical health and coping of patients and caregivers are interdependent. Several trials of subspecialty palliative care interventions have specifically targeted and measured caregiver outcomes. For more information, see the sections on Secondary Appraisal: Resources for Informal Caregivers, The Needs of Caregivers During the Cancer Trajectory, and The Psychological Consequences of Caregiving.

- Educate, Nurture, Advise Before Life Ends (ENABLE): First developed for patients with advanced cancer,[1] in 2015 this intervention was expanded to include informal caregivers and improve selected outcomes. The ENABLE III intervention included three weekly structured telephone coaching sessions, monthly follow-up, and a bereavement call. It was delivered along with the COPE (Creativity, Optimism, Planning, Expert Information) problem-solving program. [2] It was tested in 122 informal caregivers, with 61 receiving early intervention and 61 receiving delayed intervention (3 months later). Informal caregivers who received early intervention had better outcomes than caregivers who received delayed intervention. These outcomes included lower depression scores at 3 months and lower depression and stress burden in terminal analyses of decedents’ caregivers.[3]
- Early integrated palliative care in advanced-stage lung and gastrointestinal cancer: Patients and caregivers randomly assigned to the intervention arm were scheduled to meet monthly with either a subspecialty palliative care physician or an advanced-practice provider.[4] One hundred thirty-seven caregivers were assigned to early palliative care and 138 to usual care. Caregivers were invited but not required to attend. The median number of visits attended by a caregiver (not necessarily the enrolled caregiver) was 10, with a range of 1 to 51. The Hospital Anxiety and Depression Scale was administered at weeks 12 and 24. Caregivers assigned to the palliative care arm had fewer symptoms of depression at 12 weeks but not at 24 weeks. There were no differences in anxiety scores.
- Early palliative care for patients with advanced cancer: Ninety-four caregivers were randomly assigned to the intervention, which included palliative care office visits (which were not mandatory for the caregiver) and nurse phone contact the week after each monthly visit. Home visits were available. The median number of visits attended was two, with a range of zero to eight; 85% of caregivers attended at least one visit. Caregivers in the palliative care arm were more satisfied with care than caregivers in the usual-care arm, but there was no improvement in caregiver quality of life (QOL).[5]
- Palliative care and hematopoietic stem cell transplant: A trial of the effect of inpatient subspecialty palliative care visits during hospitalization for stem cell transplant demonstrated that caregivers of intervention patients experienced a smaller increase in depression than caregivers of control patients. But there were no differences in QOL or anxiety.[6] The intervention did not specifically focus on caregivers. Instead, the focus was on the patient’s physical and psychological symptoms.

### Palliative Care and End of Life

A systematic review highlighted the results of 14 studies of patients receiving end-of-life care. The review showed that cognitive behavioral therapy was conducted the most (n = 6) and demonstrated the most positive outcomes, including increased self-efficacy, improved psychological functioning, increased hope, and improved QOL across the various studies.[7]

### References

Bakitas M, Lyons KD, Hegel MT, et al.: Effects of a palliative care intervention on clinical outcomes in patients with advanced cancer: the Project ENABLE II randomized controlled trial. JAMA 302 (7): 741-9, 2009.19690306
McMillan SC, Small BJ, Weitzner M, et al.: Impact of coping skills intervention with family caregivers of hospice patients with cancer: a randomized clinical trial. Cancer 106 (1): 214-22, 2006.16329131
Dionne-Odom JN, Azuero A, Lyons KD, et al.: Benefits of Early Versus Delayed Palliative Care to Informal Family Caregivers of Patients With Advanced Cancer: Outcomes From the ENABLE III Randomized Controlled Trial. J Clin Oncol 33 (13): 1446-52, 2015.25800762
El-Jawahri A, Greer JA, Pirl WF, et al.: Effects of Early Integrated Palliative Care on Caregivers of Patients with Lung and Gastrointestinal Cancer: A Randomized Clinical Trial. Oncologist 22 (12): 1528-1534, 2017.28894017
McDonald J, Swami N, Hannon B, et al.: Impact of early palliative care on caregivers of patients with advanced cancer: cluster randomised trial. Ann Oncol 28 (1): 163-168, 2017.27687308
El-Jawahri A, LeBlanc T, VanDusen H, et al.: Effect of Inpatient Palliative Care on Quality of Life 2 Weeks After Hematopoietic Stem Cell Transplantation: A Randomized Clinical Trial. JAMA 316 (20): 2094-2103, 2016.27893130
Chi NC, Demiris G, Lewis FM, et al.: Behavioral and Educational Interventions to Support Family Caregivers in End-of-Life Care: A Systematic Review. Am J Hosp Palliat Care 33 (9): 894-908, 2016.26157046

## Parents as Caregivers

The diagnosis of childhood cancer represents the start of a period of substantial distress for parents. These parents report shock, emotional pain, difficulty coping with the necessary procedures performed on their child, rumination, and high levels of information seeking accompanied by a sense of lack of control.[1-3] One study evaluated 119 mothers and 52 fathers of children undergoing cancer treatment. The study found that all but one participant reported traumatic stress symptoms such as intrusive thoughts, physiological arousal, and avoidance.[4] In another study, parents of children undergoing treatment (n = 175) were compared with parents of children who had completed treatment (n = 238). Parents reported symptoms of traumatic stress (such as intrusion and arousal) more frequently during the acute phase of treatment than after treatment. Certain demographic factors may play a role in the degree to which parents experience significant stress that impairs function. Mothers were more likely than fathers to report higher levels of stress, and parents with fewer years of formal education and lower socioeconomic status were more likely to experience traumatic stress at any time.[5]

Patterns of parental stress in families of children treated for cancer differ from those in families of children treated for other diseases. In one large study of 675 parents, parents of children with cancer reported significantly higher levels of distress—as indicated by anxiety, physical and psychological distress, depression, and loneliness—than did parents of children with diabetes. Distress levels of the two groups of parents matched in measures of uncertainty, loss of control, self-esteem, disease-related fear, and sleep disturbances. Distress levels for parents of children with cancer decreased in intensity with longer time since diagnosis.[6]

At the same time they are dealing with increased distress, parents of children with cancer report wanting to remain strong and optimistic for their children.[7] One study found no differences in multiple measures of family distress and psychological functioning between families of children with cancer and families with healthy children.[8]

Several factors appear to predict long-term parental adjustment. Better short- and long-term adjustment is experienced by parents who:[9-11]

- Are employed.
- Have social support from family, friends, and health care team members.
- Experience lower levels of parenting stress.
- View their children’s quality of life positively.
- Have positive expectations for treatment outcome.

Factors associated with poorer parental adjustment include:[12,13]

- Low parental expectations for positive outcomes.
- Feelings of helplessness, uncertainty, and anxiety.
- Low levels of social support.
- Negative interactions with health care team members.
- Negative assessment of the child’s quality of life.

Race [14] and parent gender [15] may affect the intensity of the effect of these factors on parental functioning. In rare circumstances, the stress of coping with pain, adverse side effects, lack of control or understanding of information or outcomes, and conflicts with health care professionals may lead parents to drop out of cancer treatment for their children.[16]

Most studies suggest that over time, maternal affective distress and perceived stress decline, but the perceived burden of caring for a child with cancer remains stable, as do positive characteristics such as parental control, nurturance, and responsiveness.[14] This pattern may be related to the high levels of social support provided at the time of diagnosis. Over all phases of cancer treatment, the level of support gradually declines, while the perceived quality of support remains stable.[15] In general, parents are seen as resilient,[12][Level of evidence: II] but parental loneliness and continued uncertainty may last far beyond the treatment phase if there are ongoing late effects of treatment for the child.[17][Level of evidence: II] A few studies have found that a substantial number of parents (30%–36%) of long-term cancer survivors may experience intense, long-term, stress-related symptoms that fall below the threshold for a diagnosis of post-traumatic stress disorder (PTSD) but that are nevertheless a significant problem for these parents.[18,19][Level of evidence: II] Symptoms were severe enough that in 20% of families, at least one parent met the criteria for a diagnosis of PTSD.[19]

### References

McGrath P: Treatment for childhood acute lymphoblastic leukaemia: the fathers' perspective. Aust Health Rev 24 (2): 135-42, 2001.11496455
Levi RB, Marsick R, Drotar D, et al.: Diagnosis, disclosure, and informed consent: learning from parents of children with cancer. J Pediatr Hematol Oncol 22 (1): 3-12, 2000 Jan-Feb.10695815
Goldbeck L: Parental coping with the diagnosis of childhood cancer: gender effects, dissimilarity within couples, and quality of life. Psychooncology 10 (4): 325-35, 2001 Jul-Aug.11462231
Kazak AE, Boeving CA, Alderfer MA, et al.: Posttraumatic stress symptoms during treatment in parents of children with cancer. J Clin Oncol 23 (30): 7405-10, 2005.16157936
Norberg AL, Lindblad F, Boman KK: Parental traumatic stress during and after paediatric cancer treatment. Acta Oncol 44 (4): 382-8, 2005.16120547
Boman KK, Viksten J, Kogner P, et al.: Serious illness in childhood: the different threats of cancer and diabetes from a parent perspective. J Pediatr 145 (3): 373-9, 2004.15343194
Young B, Dixon-Woods M, Windridge KC, et al.: Managing communication with young people who have a potentially life threatening chronic illness: qualitative study of patients and parents. BMJ 326 (7384): 305, 2003.12574042
Noll RB, Gartstein MA, Hawkins A, et al.: Comparing parental distress for families with children who have cancer and matched comparison families without children with cancer. Fam Syst Med 13 (1): 11-27, 1995.
Rourke MT, Stuber ML, Hobbie WL, et al.: Posttraumatic stress disorder: understanding the psychosocial impact of surviving childhood cancer into young adulthood. J Pediatr Oncol Nurs 16 (3): 126-35, 1999.10444940 99373966
Kazak AE, Barakat LP: Brief report: parenting stress and quality of life during treatment for childhood leukemia predicts child and parent adjustment after treatment ends. J Pediatr Psychol 22 (5): 749-58, 1997.9383934
Grootenhuis MA, Last BF: Predictors of parental emotional adjustment to childhood cancer. Psychooncology 6 (2): 115-28, 1997.9205969
Dockerty JD, Williams SM, McGee R, et al.: Impact of childhood cancer on the mental health of parents. Med Pediatr Oncol 35 (5): 475-83, 2000.11070480
Santacroce S: Uncertainty, anxiety, and symptoms of posttraumatic stress in parents of children recently diagnosed with cancer. J Pediatr Oncol Nurs 19 (3): 104-11, 2002 May-Jun.12066262
Steele RG, Long A, Reddy KA, et al.: Changes in maternal distress and child-rearing strategies across treatment for pediatric cancer. J Pediatr Psychol 28 (7): 447-52, 2003 Oct-Nov.12968036
Hoekstra-Weebers JE, Jaspers JP, Kamps WA, et al.: Psychological adaptation and social support of parents of pediatric cancer patients: a prospective longitudinal study. J Pediatr Psychol 26 (4): 225-35, 2001.11329482
Yeh CH, Lin CF, Tsai JL, et al.: Determinants of parental decisions on 'drop out' from cancer treatment for childhood cancer patients. J Adv Nurs 30 (1): 193-9, 1999.10403996
Van Dongen-Melman JE, Pruyn JF, De Groot A, et al.: Late psychosocial consequences for parents of children who survived cancer. J Pediatr Psychol 20 (5): 567-86, 1995.7500231
Brown RT, Madan-Swain A, Lambert R: Posttraumatic stress symptoms in adolescent survivors of childhood cancer and their mothers. J Trauma Stress 16 (4): 309-18, 2003.12895012
Kazak AE, Alderfer M, Rourke MT, et al.: Posttraumatic stress disorder (PTSD) and posttraumatic stress symptoms (PTSS) in families of adolescent childhood cancer survivors. J Pediatr Psychol 29 (3): 211-9, 2004 Apr-May.15131138

## Latest Updates to This Summary (05/06/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about challenges and helpful interventions for caregivers of cancer patients. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Informal Caregivers in Cancer are:

- Larry D. Cripe, MD (Indiana University School of Medicine)
- Edward B. Perry, MD (VA Connecticut Healthcare System)
- Maria Petzel, RD, CSO, LD, CNSC, FAND (University of TX MD Anderson Cancer Center)
- Rachel A. Pozzar, PhD, RN (Dana-Farber Cancer Institute)
- Diane Von Ah, PhD, RN, FAAN (The Ohio State University)
- Amy Wachholtz, PhD, MDiv, MS, ABPP (University of Colorado)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Informal Caregivers in Cancer. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/coping/family-friends/family-caregivers-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389284]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).